# Anal Cancer Prevention (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about anal cancer prevention. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Screening and Prevention Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Overview

Note: The Overview section summarizes the published evidence on this topic. The rest of the summary describes the evidence in more detail.

Another PDQ summary on Anal Cancer Treatment is also available.

### Who Is at Risk?

Human papillomavirus (HPV) infection is the strongest risk factor for anal cancer and is accepted as a causal agent of squamous cell carcinoma of the anus and its precursor lesions.[1] Behaviors or medical conditions that either indicate HPV infection or facilitate HPV transmission or persistence are associated with increased risk. These behaviors and conditions include a history of HPV-related cancers, high-risk sexual practices such as sex between men, receptive anal intercourse and numerous sexual partners, human immunodeficiency virus (HIV) infection, and chronic immunosuppressive states.[2] Cigarette smoking is also a risk factor.[3]

### Factors Associated With Increased Risk of Anal Cancer

#### Anal HPV infection

Based on solid evidence, HPV infection causes squamous cell carcinoma of the anus.

Magnitude of Effect: About 90% of anal squamous cell cancers occur in individuals with detectable HPV infection.[4] Of those, HPV strain 16 (HPV-16) and/or HPV-18 are detectable in more than 90% of cases.[4] Eighty-five percent of anal cancers have squamous cell histology.[2]

- Study Design: Case series in men and women (HPV typing of tumor tissue).
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

#### Behaviors or medical conditions associated with HPV infection

Based on solid evidence, behaviors or medical conditions that either indicate HPV infection or facilitate HPV transmission or persistence increase the risk or are associated with increased risk of anal cancer.

Magnitude of Effect: Risk varies by behavior and medical condition.

- History of cervical, vaginal, and vulvar cancer increases risk at least threefold.[5-8]
- High-risk sexual practices increase risk at least twofold, higher for individuals with many sexual partners and those who engage in receptive anal intercourse.[3,9-11]
- Chronic immunosuppressive states increase risk about 30-fold for individuals who are HIV positive, and risk is much higher for men who both are HIV positive and have sex with men.[12]
- Risk is at least threefold higher for organ transplant recipients.[11]
  - Study Design: Cohort, cancer registries, case-control studies.
  - Internal Validity: Good.
  - Consistency: Good.
  - External Validity: Good.

#### Cigarette smoking

Based on solid evidence, cigarette smoking increases the risk of anal cancer.

Magnitude of Effect: Risk is about twofold to threefold for ever-smokers; current smokers are at higher risk.[3,11,13]

- Study Design: Cohort, case-control studies.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

### Interventions Associated With a Decreased Risk of Anal Cancer

#### HPV vaccination

Based on solid evidence, HPV vaccination of men aged 16 to 26 years who have sex with men in the year before vaccination reduces anal intraepithelial neoplasia (AIN), a precursor lesion of anal cancer.

Magnitude of Effect: Vaccine efficacy against HPV-6, -11, -16, or -18–related AIN is between 50% and 75%.[14] Among those individuals who were naïve to vaccine types, incident quadrivalent HPV-type–associated anal low-grade squamous cell intraepithelial lesions (LSIL)/high-grade squamous cell intraepithelial lesions (HSIL) were not detected. In comparison, 11.1, 2.2, 4.5, and 2.8 cases per 100 person-years were reported for HPV-6, -11, -16, and -18–associated LSIL/HSIL, respectively, among those who were previously exposed to that respective HPV-type.[15]

- Study Design: Randomized controlled trial, phase II open-label study.
- Internal Validity: Good.
- Consistency: Not applicable (N/A)—only one study.
- External Validity: Good.

Based on national population-level observational data trends, HPV vaccination appears to decrease the risk of anal carcinoma in situ and invasive anal cancer among individuals aged 20 to 44 years after 2008 (when HPV vaccines were widely available).

Magnitude of Effect: Although direct efficacy of the HPV vaccine could not be measured in this population-level analysis, results showed a statistically significant decrease in the incidence of both anal carcinoma in situ (24% decrease) and invasive anal cancer (15% decrease). Older age groups (>45 years) who were not eligible for the HPV vaccine demonstrated increased HPV incidence after 2008.[16]

- Study Design: National population-level cancer data.
- Internal Validity: Good.
- Consistency: Data from other HPV-related cancers, including population-level cervical cancer data, have shown similar decreases in overall cervical cancer incidence.
- External Validity: Good.

#### Screening with high-resolution anoscopy (HRA) and treatment for high-grade squamous intraepithelial lesions (HSIL)

Utilizing data from a cohort of 28,175 individuals undergoing treatment for HIV in the Netherlands, anal cancer incidence significantly decreased over time. In a subcohort of 3,866 men who have sex with men (MSM) and had HRA-based anal cancer screening at least once, anal cancer mortality decreased by 31% when compared with those who did not participate in anal cancer screening (even after controlling for CD4 count less than 200).

Even though people living with HIV represent a high-risk population, anal cancer is still rare, and there were few anal cancers in this cohort, rendering conclusions difficult. In particular, there were only 37 anal cancers in men who do not have sex with men and only 10 among women. As a result, confidence intervals (CIs) were wide, and conclusions were suggestive at best.

Magnitude of Effect: Although direct efficacy of screening with HRA could not be measured in this cohort study, it found a statistically significant decrease in anal cancer mortality from 24% in the unscreened population to 3.7% in the screened population.

- Study Design: Retrospective observational.
- Internal Validity: Fair.
- Consistency: Good.
- External Validity: Fair.

#### Treatment of anal HSIL

Based on solid evidence, treating anal HSIL prevents anal cancer in HIV-positive individuals older than 35 years. When compared with the active monitoring arm, active HSIL treatment was associated with a decreased progression to anal cancer incidence by 57%.[17]

- Study Design: Randomized phase III clinical trial.
- Internal Validity: Good.
- Consistency: N/A—only one study.
- External Validity: Fair.

### Interventions With Inadequate Evidence as to Whether They Reduce the Risk of Anal Cancer

#### Condom use

In a study of HPV transmission, MSM, recently had anal sex, and never use condoms were more likely to be infected with oncogenic HPV strains than were those who always used condoms. However, the association was not statistically significant.

Magnitude of Effect: About twofold but not statistically significant (odds ratio, 1.81; 95% CI, 0.58–5.68).[18]

- Study Design: Case-control study.
- Internal Validity: Fair.
- Consistency: N/A—only one study.
- External Validity: Fair.

### References

IARC Working Group on the Evaluation of Carcinogenic Risks to Humans: Human papillomaviruses. IARC Monogr Eval Carcinog Risks Hum 90: 1-636, 2007.18354839
Zandberg DP, Bhargava R, Badin S, et al.: The role of human papillomavirus in nongenital cancers. CA Cancer J Clin 63 (1): 57-81, 2013.23258613
Daling JR, Madeleine MM, Johnson LG, et al.: Human papillomavirus, smoking, and sexual practices in the etiology of anal cancer. Cancer 101 (2): 270-80, 2004.15241823
Parkin DM, Bray F: Chapter 2: The burden of HPV-related cancers. Vaccine 24 (Suppl 3): S3/11-25, 2006.16949997
Chaturvedi AK, Engels EA, Gilbert ES, et al.: Second cancers among 104,760 survivors of cervical cancer: evaluation of long-term risk. J Natl Cancer Inst 99 (21): 1634-43, 2007.17971527
Hemminki K, Dong C, Vaittinen P: Second primary cancer after in situ and invasive cervical cancer. Epidemiology 11 (4): 457-61, 2000.10874555
Ruth A, Kosary A, Hildesheim A: New malignancies following cancer of the cervix uteri, vagina, and vulva. In: Curtis RE, Freedman DM, Ron E, et al., eds.: New Malignancies Among Cancer Survivors: SEER Cancer Registries, 1973-2000. National Cancer Institute, 2006. NIH Pub. No. 05-5302, pp 207-30.
Saleem AM, Paulus JK, Shapter AP, et al.: Risk of anal cancer in a cohort with human papillomavirus-related gynecologic neoplasm. Obstet Gynecol 117 (3): 643-9, 2011.21343768
Daling JR, Weiss NS, Hislop TG, et al.: Sexual practices, sexually transmitted diseases, and the incidence of anal cancer. N Engl J Med 317 (16): 973-7, 1987.2821396 88014034
Frisch M, Glimelius B, van den Brule AJ, et al.: Sexually transmitted infection as a cause of anal cancer. N Engl J Med 337 (19): 1350-8, 1997.9358129
van der Zee RP, Richel O, de Vries HJ, et al.: The increasing incidence of anal cancer: can it be explained by trends in risk groups? Neth J Med 71 (8): 401-11, 2013.24127500
Silverberg MJ, Lau B, Justice AC, et al.: Risk of anal cancer in HIV-infected and HIV-uninfected individuals in North America. Clin Infect Dis 54 (7): 1026-34, 2012.22291097
Nordenvall C, Nilsson PJ, Ye W, et al.: Smoking, snus use and risk of right- and left-sided colon, rectal and anal cancer: a 37-year follow-up study. Int J Cancer 128 (1): 157-65, 2011.20209500
Palefsky JM, Giuliano AR, Goldstone S, et al.: HPV vaccine against anal HPV infection and anal intraepithelial neoplasia. N Engl J Med 365 (17): 1576-85, 2011.22029979
Palefsky JM, Lensing SY, Belzer M, et al.: High Prevalence of Anal High-Grade Squamous Intraepithelial Lesions, and Prevention Through Human Papillomavirus Vaccination, in Young Men Who Have Sex With Men Living With Human Immunodeficiency Virus. Clin Infect Dis 73 (8): 1388-1396, 2021.33991185
Berenson AB, Guo F, Chang M: Association of Human Papillomavirus Vaccination With the Incidence of Squamous Cell Carcinomas of the Anus in the US. JAMA Oncol 8 (4): 1-3, 2022.35142803
Palefsky JM, Lee JY, Jay N, et al.: Treatment of Anal High-Grade Squamous Intraepithelial Lesions to Prevent Anal Cancer. N Engl J Med 386 (24): 2273-2282, 2022.35704479
Nyitray AG, Carvalho da Silva RJ, Baggio ML, et al.: Age-specific prevalence of and risk factors for anal human papillomavirus (HPV) among men who have sex with women and men who have sex with men: the HPV in men (HIM) study. J Infect Dis 203 (1): 49-57, 2011.21148496

## Incidence, Mortality, and Survival

### United States

The Surveillance, Epidemiology, and End Results (SEER) Program age-adjusted annual incidence rate of anal cancer in the United States from 2017 to 2021 was 1.9 cases per 100,000 persons per year, and the mortality rate was 0.4 cases per 100,000 persons per year from 2018 to 2022. Incidence rates were slightly higher for women than for men (2.3 vs. 1.6 per 100,000 person-years, respectively), but mortality rates were about the same.[1] In 2025, it is estimated that 10,930 Americans will be diagnosed with anal cancer and 2,030 will die of this disease.[2] Incidence rates increased annually from 2012 to 2021 (average increase, 1.3%), and mortality rates increased annually from 2013 to 2022 (average increase, 5.1%). All incidence and mortality increases were statistically different from zero.[3] The 5-year survival rate has remained fairly constant since 1975, and based on data from 2014 to 2020, it was 70.6%.[1]

### World

An estimated 27,000 new cases of anal cancer were diagnosed worldwide in 2008.[4] No global incidence rates, mortality rates, or survival statistics are available.

### References

National Cancer Institute: SEER Stat Fact Sheets: Anal Cancer. Bethesda, Md: National Cancer Institute. Available online (https://seer.cancer.gov/statfacts/html/anus.html). Last accessed April 8, 2025.
American Cancer Society: Cancer Facts and Figures 2025. American Cancer Society, 2025. Available online (https://www.cancer.org/content/dam/cancer-org/research/cancer-facts-and-statistics/annual-cancer-facts-and-figures/2025/2025-cancer-facts-and-figures-acs.pdf). Last accessed January 16, 2025.
Surveillance Research Program, National Cancer Institute: SEER*Explorer: An interactive website for SEER cancer statistics. Bethesda, MD: National Cancer Institute. Available online (https://seer.cancer.gov/statistics-network/explorer/). Last accessed December 30, 2024.
Forman D, de Martel C, Lacey CJ, et al.: Global burden of human papillomavirus and related diseases. Vaccine 30 (Suppl 5): F12-23, 2012.23199955

## Histology

About 85% of anal cancers in the United States have squamous cell histology or a histological variant.[1] Nearly all other anal cancers are adenocarcinomas.[2] Human papillomavirus (HPV) vaccination, HPV screening, and screening for the presence of anal cancer precursor lesions will probably change the histological distribution of anal cancer in years to come, as HPV is implicated only in squamous cell carcinomas,[3] and identification of precursor lesions is expected to reduce invasive squamous cell disease.

### Precursor Lesions

Squamous cell cancer of the anus is preceded by grade 2 or 3 anal intraepithelial neoplasia (AIN), also referred to as high-grade AIN. Grade 1 AIN is not considered a precursor lesion of anal cancer but may precede high-grade AIN.[4] The cytological terms for low- and high-grade AIN are low-grade squamous cell intraepithelial lesions (LSIL) and high-grade squamous cell intraepithelial lesions (HSIL).[4]

One study reported that 11% of AIN cases progressed to invasive disease over an 8-year period.[5] However, results from another study suggested that progression is much less frequent. Using AIN prevalence and anal cancer incidence data, the investigators estimated hypothetical annual rates of progression from high-grade AIN to anal cancer. For men who have sex with men (MSM) and who are human immunodeficiency virus (HIV) positive, the rate was about 1 case in 600 patients. For HIV-negative MSM, the rate was 1 case in 4,000 patients.[6] Using meta-analysis techniques to combine data from numerous studies worldwide, the investigators estimated that the prevalence of LSIL is 27.5% (95% confidence interval [CI], 21.9%–33.2%) and the prevalence of HSIL is 6.7% (95% CI, 4.4%–9.0%) in HIV-positive MSM. Among HIV-negative MSM, the prevalence of LSIL was 6.6% (95% CI, 1.1%–12.1%), and the prevalence of HSIL was 2.7% (95% CI, 0.0%–5.1%).[6]

### References

Zandberg DP, Bhargava R, Badin S, et al.: The role of human papillomavirus in nongenital cancers. CA Cancer J Clin 63 (1): 57-81, 2013.23258613
Ries LAG, Young JL, Keel GE, et al., eds.: SEER Survival Monograph: Cancer Survival Among Adults: U. S. SEER Program, 1988-2001, Patient and Tumor Characteristics. National Cancer Institute, 2007. NIH Pub. No. 07-6215.
Joseph DA, Miller JW, Wu X, et al.: Understanding the burden of human papillomavirus-associated anal cancers in the US. Cancer 113 (10 Suppl): 2892-900, 2008.18980293
Hoots BE, Palefsky JM, Pimenta JM, et al.: Human papillomavirus type distribution in anal cancer and anal intraepithelial lesions. Int J Cancer 124 (10): 2375-83, 2009.19189402
Watson AJ, Smith BB, Whitehead MR, et al.: Malignant progression of anal intra-epithelial neoplasia. ANZ J Surg 76 (8): 715-7, 2006.16916390
Machalek DA, Poynten M, Jin F, et al.: Anal human papillomavirus infection and associated neoplastic lesions in men who have sex with men: a systematic review and meta-analysis. Lancet Oncol 13 (5): 487-500, 2012.22445259

## Risk Factors

### Factors Associated With Increased Risk of Anal Cancer

#### Anal HPV infection

Human papillomavirus (HPV) infection is the strongest risk factor for anal cancer. About 90% of anal cancers occur in individuals with detectable HPV infection.[1] HPV infection with oncogenic HPV strains is accepted as a causal agent and necessary condition for development of squamous cell carcinoma of the anus and its precursor lesions.[2] In a 2009 meta-analysis of about 1,000 invasive squamous cell lesions, HPV-16 was present in about two-thirds of lesions, and HPV-18 was present in about 5% of lesions.[3] Because 85% of anal cancers have a squamous cell carcinoma histology or a histological variant,[4] it is probable that elimination of oncogenic HPV infection would nearly eradicate anal cancer.

HPVs are typically cleared rapidly in healthy individuals. Persistence of the oncogenic HPV strains is more likely in individuals with compromised immune systems; therefore, the risk of squamous cell anal cancer is much higher in these individuals. Behaviors that facilitate transmission of HPVs also increase risk.[4] While these conditions or behaviors will probably have, at most, little independent effect on squamous cell anal cancer risk (that is, in the absence of HPV), data that fully address this hypothesis are very limited.

Given the paucity of cases of anal adenocarcinoma and other nonsquamous histological subtypes, it is unknown what role, if any, HPV plays in the development of these lesions.

#### Behaviors or medical conditions associated with HPV infection

##### History of cervical, vaginal, and vulvar cancer

Cancers of the cervix, vagina, and vulva are HPV-related cancers.[5] Long-term registry-based monitoring of cervical, vaginal, and vulvar cancer survivors demonstrates an increase in anal cancer risk for these individuals, although the magnitude of the relationship varies.[6-9] For survivors of invasive cervical cancer, the standardized incidence ratio (SIR) for anal cancer was 3.1 (95% confidence interval [CI], 1.9–4.9) in a cohort of more than 100,000 cervical cancer survivors from Denmark, Finland, Norway, Sweden, and the United States.[6] The SIR for anal cancer was 6.2 (95% CI, 4.1–8.7) for survivors of invasive cervical cancer in the Surveillance, Epidemiology, and End Results (SEER) Program registry data from 1973 to 2007 (more than 1 million person-years).[8] In the latter cohort, the SIR for women with in situ cervical cancer was 16.4 (95% CI, 13.7–19.2). In an analysis of data from the Swedish Family-Cancer Database, which used data from 1958 to 1996, SIRs were 3.8 (95% CI, 2.9–4.7) among the women with in situ cervical cancer and 3.9 (95% CI, 2.3–6.0) among the women with invasive cervical cancer.[8] In the aforementioned multicountry cohort,[6] the anal cancer SIRs for in situ and invasive vaginal cancer were 7.6 (95% CI, 2.4–15.6) and 1.8 (95% CI, 0.2–5.3), respectively; the anal cancer SIRs for in situ and invasive vulvar cancer were 22.2 (95% CI, 16.7–28.4) and 17.4 (95% CI, 16.7–28.4), respectively.

Individuals with cancer of the oropharynx [10] and penis,[11] two other HPV-associated cancers, are hypothesized to be at increased risk of anal cancer. From 1973 to 2007 (more than 1 million person-years),[7] it was estimated that the observed-to-expected ratio for anal cancer among people with oropharyngeal cancer was twofold (significantly different from one). In that same data source, it was also estimated that no anal cancers occurred after penile cancer, although the expected number of cases was 0.36.

##### HIV infection/AIDS

The association between HIV infection and anal cancer is strong. One meta-analysis indicated a 30-fold increase in anal cancer in HIV-infected people, compared with the general population (SIR, 28.8; 95% CI, 21.6–38.3).[12] A nationwide Danish cohort study with data from 1995 to 2009 observed an even stronger association (incidence rate ratio, 77.9; 95% CI, 36.2–167.7).[13] This association between HIV infection and anal cancer is confounded or modified by other factors associated with anal cancer, such as HPV status, high-risk behaviors, and level of immunocompromise. For example, the magnitude of the association between HIV infection and anal cancer risk varies by sexual preference. In one study,[14] the highest SIR and the highest incidence rate were observed for HIV-positive men who have sex with men (MSM), compared with HIV-negative men (SIR, 80.3; 95% CI, 42.7–151.1). The incidence rate for HIV-positive MSM is 131 cases per 100,000 person-years. The SIR for HIV-positive men who did not have sex with men was lower but nonnegligible (SIR, 26.7; 95% CI, 11.5–61.7; incidence rate, 46 cases per 100,000 person-years). In the same study, 30 of 8,842 HIV-positive women had anal cancer diagnoses (incidence rate, 2 cases per 100,000 person-years) but none of the 11,653 HIV-negative women were diagnosed with anal cancer; thus, no SIR could be calculated, and the incidence rate was zero. Among men with anal cancer, the Danish study observed a mortality rate ratio of 3.2 (95% CI, 1.1–9.2) for HIV-positive men compared with men in the general population.[13]

Anal HPV infection is common in HIV-positive individuals. Studies suggest an HPV prevalence of 85% to 95% among HIV-positive MSM, 76% to 90% in HIV-positive women, and 60% in HIV-positive heterosexual men.[14]

In a cohort of almost 7,000 men with AIDS, 28 anal cancers occurred, and the odds ratios (OR) suggested relatively modest elevations (about twofold) in risk as the prevalence of high-risk behaviors increased. However, the only statistically significant OR relating to sexual practices was for seven or more unprotected anal receptive sexual partners during the time between study onset and the third study visit (OR, 4.0; 95% CI, 1.1–14.6).[15] In a cohort of nearly half a million AIDS patients, intravenous drug use was associated with anal cancer (SIR, 11.7; 95% CI, 4.2–25.5 for men and SIR, 38.0; 95% CI, 10.3–97.3 for women).[16] Current cigarette smoking, relative to never smoking, has also been observed to increase anal cancer risk in HIV-positive individuals (OR, 2.6; 95% CI, 1.3–5.3).[17]

Anal cancer risk is positively associated with severity of immunosuppression in HIV-positive and AIDS patients.[14] When combined antiretroviral therapy (cART) became available in 1996, the incidence of anal cancer among these patients was expected to decrease. While decreases have been observed for other HIV-associated cancers, such trends have not been observed for anal cancer. It has been proposed that timing of cART treatment influences the risk of anal cancer, and that to be effective against anal cancer, cART must be administered to those with HPV infection earlier in the course of infection than has been clinically practiced.[18] One study suggests that immunosuppression levels 6 to 7 years before anal cancer diagnosis may be more strongly associated with odds of developing the disease than immunosuppression levels in the 12 months before anal cancer diagnosis.

Investigators reported ORs for CD4+ counts 6 to 7 years before anal cancer diagnosis as follows:[17]

- For counts of 350 to 499: OR, 2.8 (95% CI, 0.6–13.0).
- For counts of 200 to 349: OR , 5.9 (95% CI, 1.5–23.0).
- For counts lower than 200: OR, 14.0 (95% CI, 3.9–50.9).

ORs for CD4+ counts in the 12 months before diagnosis were as follows:

- For counts of 350 to 499: OR, 2.0 (95% CI, 0.9–4.6).
- For counts of 200 to 349: OR, 2.2 (95% CI, 1.1–4.6).
- For counts lower than 200: OR, 4.6 (95% CI, 1.8–11.4).

Similar patterns were observed for CD8+ cell counts and for CD4+/CD8+ ratios.

##### Sexual practices associated with increased risk

Sexual practices that confer elevation in anal cancer risk include receptive anal intercourse, numerous sexual partners, and sex between men.[19] These are practices that are known or believed to increase anal exposure to oncogenic strains of HPV. Because HPV and HIV infection are highly correlated with high-risk sexual practices, few data exist that assess the independent effects of sexual behaviors. Before the HIV/AIDS era, the epidemiology of anal cancer received little attention; it was only as the concurrent emergence of AIDS and the increase in anal cancer occurred that sexual practices were investigated as possible risk factors.

Regardless of the underlying reason, MSM have the highest rates of anal cancer when compared with other men and women. As previously mentioned, HIV-positive MSM have the highest anal cancer rates (about 50 cases per 100,000 person-years),[20] but HIV-negative MSM have significantly higher rates than do men in the general population; their incidence is estimated to be 5 cases per 100,000 person-years.[20] Case-control studies have observed a modest (about twofold) increase in risk for women who practice receptive anal intercourse;[21,22] however, one study found the association to exist only among women who first had anal intercourse before age 30 years (OR, 3.4; 95% CI, 1.7–6.6).[21] In the same study, adjusted ORs for both men and women increased with increasing lifetime number of sexual partners. The OR associated with 10 or more partners was 4.5 (95% CI, 2.7–7.4) for women and 2.5 (95% CI, 1.1–5.5) for men. Increased risk for both men and women has been observed with a history of anal warts and certain other sexually transmitted diseases.[21]

##### Chronic immunosuppressive states other than HIV infection

Chronic immunosuppression in general is thought to increase risk of anal cancer because of its impact on the ability to clear HPV infection.[19] Organ transplant recipients are at elevated risk of anal cancer because immunosuppressant medications are used to prevent organ rejection. Three large transplant cohort studies have observed SIRs for anal cancer of 2.8 (95% CI, 1.5–4.6),[12] 5.8 (95% CI, 4.7–7.2),[23] and 10.3 (95% CI, 2.8–26.6).[12] Autoimmune disorders are hypothesized to increase risk of anal cancer because of the condition, the treatment, or both. However, the rarity of anal cancer and relative rarity of many of these disorders have led to conflicting findings or limited data. A cohort study of the Denmark National Patient Registry that included nearly 30 years’ experience observed statistically significant threefold increases in risk for Crohn disease (SIR, 3.1; 95% CI, 1.2–6.4) and psoriasis (SIR, 3.1; 95% CI, 1.8–5.1), as well as a ninefold increase for polyarteritis nodosa (SIR, 8.8; 95% CI, 1.5–29.0) and a 12-fold increase in Wegener granulomatosis (SIR, 12.4; 95% CI, 2.1–40.8).[24]

#### Cigarette smoking

Cigarette smoking was among the first risk factors for anal cancer to be identified. In 1987, a case-control study of 58 men and 90 women observed a ninefold increase in risk (relative risk [RR], 9.4; 95% CI, 2.3–38.5) for men and an eightfold increase in risk for women (RR, 7.7; 95% CI, 3.5–17.2) for current smokers after adjustment for number of sexual partners.[25] RRs for former smokers were not statistically significant and less than twofold. Another case-control study of 306 patients suggested that current cigarette smoking may be an independent risk factor for anal cancer because adjustment for HPV status and number of sexual partners dampened but did not eliminate the significant associations observed in the 1987 study. The OR was 3.9 (95% CI, 1.9–8.0) for men and 3.8 (95% CI, 2.3–6.2) for women.[22] Given the rarity of anal cancer, studies have not been able to rigorously explore whether risk of anal cancer varies by other aspects of smoking history, such as pack-years smoked and time since cessation. The latter would be of particular interest, given the observation of strong risk in current smokers but no risk in former smokers.

### References

Parkin DM, Bray F: Chapter 2: The burden of HPV-related cancers. Vaccine 24 (Suppl 3): S3/11-25, 2006.16949997
IARC Working Group on the Evaluation of Carcinogenic Risks to Humans: Human papillomaviruses. IARC Monogr Eval Carcinog Risks Hum 90: 1-636, 2007.18354839
Hoots BE, Palefsky JM, Pimenta JM, et al.: Human papillomavirus type distribution in anal cancer and anal intraepithelial lesions. Int J Cancer 124 (10): 2375-83, 2009.19189402
Zandberg DP, Bhargava R, Badin S, et al.: The role of human papillomavirus in nongenital cancers. CA Cancer J Clin 63 (1): 57-81, 2013.23258613
Forman D, de Martel C, Lacey CJ, et al.: Global burden of human papillomavirus and related diseases. Vaccine 30 (Suppl 5): F12-23, 2012.23199955
Chaturvedi AK, Engels EA, Gilbert ES, et al.: Second cancers among 104,760 survivors of cervical cancer: evaluation of long-term risk. J Natl Cancer Inst 99 (21): 1634-43, 2007.17971527
Saleem AM, Paulus JK, Shapter AP, et al.: Risk of anal cancer in a cohort with human papillomavirus-related gynecologic neoplasm. Obstet Gynecol 117 (3): 643-9, 2011.21343768
Hemminki K, Dong C, Vaittinen P: Second primary cancer after in situ and invasive cervical cancer. Epidemiology 11 (4): 457-61, 2000.10874555
Ruth A, Kosary A, Hildesheim A: New malignancies following cancer of the cervix uteri, vagina, and vulva. In: Curtis RE, Freedman DM, Ron E, et al., eds.: New Malignancies Among Cancer Survivors: SEER Cancer Registries, 1973-2000. National Cancer Institute, 2006. NIH Pub. No. 05-5302, pp 207-30.
Frisch M, Melbye M: Anal cancer. In: Schottenfeld D, Fraumeni JF Jr, eds.: Cancer Epidemiology and Prevention. 3rd ed. Oxford University Press, 2006, pp 830-40.
McMaster ML, Feuer EJ, Tucker MA: New malignancies following cancer of the male genital tract. In: Curtis RE, Freedman DM, Ron E, et al., eds.: New Malignancies Among Cancer Survivors: SEER Cancer Registries, 1973-2000. National Cancer Institute, 2006. NIH Pub. No. 05-5302, pp 257-84.
Grulich AE, van Leeuwen MT, Falster MO, et al.: Incidence of cancers in people with HIV/AIDS compared with immunosuppressed transplant recipients: a meta-analysis. Lancet 370 (9581): 59-67, 2007.17617273
Legarth R, Helleberg M, Kronborg G, et al.: Anal carcinoma in HIV-infected patients in the period 1995-2009: a Danish nationwide cohort study. Scand J Infect Dis 45 (6): 453-9, 2013.23294033
Silverberg MJ, Lau B, Justice AC, et al.: Risk of anal cancer in HIV-infected and HIV-uninfected individuals in North America. Clin Infect Dis 54 (7): 1026-34, 2012.22291097
D'Souza G, Wiley DJ, Li X, et al.: Incidence and epidemiology of anal cancer in the multicenter AIDS cohort study. J Acquir Immune Defic Syndr 48 (4): 491-9, 2008.18614927
Chaturvedi AK, Madeleine MM, Biggar RJ, et al.: Risk of human papillomavirus-associated cancers among persons with AIDS. J Natl Cancer Inst 101 (16): 1120-30, 2009.19648510
Bertisch B, Franceschi S, Lise M, et al.: Risk factors for anal cancer in persons infected with HIV: a nested case-control study in the Swiss HIV Cohort Study. Am J Epidemiol 178 (6): 877-84, 2013.23900553
Engels EA, Madeleine MM: Invited commentary: Biological and clinical insights from epidemiologic research into HIV, HPV, and anal cancer. Am J Epidemiol 178 (6): 885-7, 2013.23900552
van der Zee RP, Richel O, de Vries HJ, et al.: The increasing incidence of anal cancer: can it be explained by trends in risk groups? Neth J Med 71 (8): 401-11, 2013.24127500
Machalek DA, Poynten M, Jin F, et al.: Anal human papillomavirus infection and associated neoplastic lesions in men who have sex with men: a systematic review and meta-analysis. Lancet Oncol 13 (5): 487-500, 2012.22445259
Frisch M, Glimelius B, van den Brule AJ, et al.: Sexually transmitted infection as a cause of anal cancer. N Engl J Med 337 (19): 1350-8, 1997.9358129
Daling JR, Madeleine MM, Johnson LG, et al.: Human papillomavirus, smoking, and sexual practices in the etiology of anal cancer. Cancer 101 (2): 270-80, 2004.15241823
Engels EA, Pfeiffer RM, Fraumeni JF, et al.: Spectrum of cancer risk among US solid organ transplant recipients. JAMA 306 (17): 1891-901, 2011.22045767
Sunesen KG, Nørgaard M, Thorlacius-Ussing O, et al.: Immunosuppressive disorders and risk of anal squamous cell carcinoma: a nationwide cohort study in Denmark, 1978-2005. Int J Cancer 127 (3): 675-84, 2010.19960431
Daling JR, Weiss NS, Hislop TG, et al.: Sexual practices, sexually transmitted diseases, and the incidence of anal cancer. N Engl J Med 317 (16): 973-7, 1987.2821396 88014034

## Interventions Associated With a Decreased Risk of Anal Cancer

### HPV Vaccination

Because human papillomavirus (HPV) is a causal condition for squamous cell anal cancer development, vaccination against the oncogenic strains of HPV before exposure may reduce the risk of anal cancer. Conducted from 2004 to 2008, a multicountry trial randomly assigned 4,065 boys and men to receive either the three-shot quadrivalent HPV vaccine regimen (for HPV-6, -11, -16, and -18) or a three-shot placebo injection regimen. Of the 4,065 patients, 602 reported having sex with male partners in the year before enrollment. Heterosexual participants were between the ages of 16 years and 23 years and had no more than five lifetime female partners. Patients who reported sex with male partners were between the ages of 16 years and 26 years and had no more than five lifetime male or female partners. Persistent infection was defined as detection of the same HPV type in anogenital swabs or biopsy specimens collected on two or more consecutive visits, with an interval of 6 months between visits. In the intent-to-treat analysis, which included participants regardless of their baseline HPV status, the efficacy against persistent HPV-6, -11, -16, and -18 infection was 48% (95% confidence interval [CI], 36.0%–57.6%). Among those who were negative for the four HPV strains of interest at baseline (per the protocol analysis, which included 1,397 intervention-arm and 1,408 control-arm participants), vaccine efficacy against persistent HPV-6, -11, -16, and -18 infection was 90% (95% CI, 69.2%–98.1%).[1]

A nonrandomized, phase II, open-label trial (AMC 072 [NCT01209325 (https://www.cancer.gov/clinicaltrials/NCT01209325)]) was conducted in 149 men who have sex with men living with HIV. This study did not show a statistically significant difference between incident-persistent infections in the naïve, per-protocol, and previously exposed per-protocol groups. However, there was a statistically significant reduction in incident HPV-16–associated histological high-grade squamous intraepithelial lesions (HSIL) in the naïve group when compared with the previously exposed group (P = .014). The authors conducted a secondary analysis that compared the per-protocol quadrivalent HPV (qHPV)-type naïve participants in the AMC 072 trial to the original, per-protocol placebo group in the Merck 020 trial. This analysis demonstrated that vaccinated qHPV-naïve AMC-072 participants had significantly reduced disease in a combined analysis of all four qHPV types (5.8 per 100 person-years vs. 0 per 100 person-years; P = .008).[2]

Among the 602 patients who had sex with men, the vaccine efficacy against persistent HPV-6, -11, -16, and -18 infection was 59% (95% CI, 43.0%–71.4%) in the intent-to-treat analysis and 95% (95% CI, 80.4%–99.4%) in the per-protocol analysis. Efficacy against HPV-6, -11, -16 or -18–associated anal intraepithelial neoplasia (AIN) was 50% (95% CI, 25.7%–67.2%) in the intention-to-treat analysis and 77.5% (95% CI, 39.6%–93.9%) in the per-protocol analysis (275 intervention-arm and 276 control-arm participants). Efficacy against HPV-6, -11, -16, or -18–associated high-grade AIN was 54.2% (95% CI, 18.0%–75.3%) in the intent-to-treat analysis and 74.9% (95% CI, 8.8%–95.4%) in the per-protocol analysis (194 intervention-arm and 208 control-arm participants).[3]

Efficacy of the bivalent (HPV-16 and HPV-18) vaccine against anal infection was evaluated in the context of a randomized controlled trial of cervical cancer prevention. Conducted in 6,300 Costa Rican women aged 18 to 25 years at enrollment, the trial compared the efficacy of the three-dose bivalent vaccine with that of a control vaccine. Four years after vaccination, most women were offered the option of providing an anal specimen. Among the 2,103 intervention-arm and 2,107 control-arm participants who provided specimens, vaccine efficacy (i.e., absence of HPV-16 or -18 in the specimen) was 62% (95% CI, 47.1%–73.1%). Among the 1,003 intervention-arm and 986 control-arm participants who provided anal specimens, received the three doses, had no evidence of cervical HPV-16 or -18 infection before vaccination, and were seronegative before vaccination, vaccine efficacy was 84% (95% CI, 66.7%–92.8%).[4]

These data strongly suggest that vaccination against oncogenic HPV strains will lead to reductions in anal cancer. They also suggest that vaccination before exposure will provide the most benefit.

### Treatment of Anal HSIL

Until the Anal Cancer–HSIL Outcomes Research (ANCHOR) trial was published, there had not been confirmation that treating anal HSIL decreased an individual's risk for invasive cancer.[5] However, the findings from the ANCHOR trial provided solid evidence that treatment of anal HSIL prevented the incidence of anal cancer. This trial, which was a phase III trial conducted at 25 U.S. sites, included individuals living with HIV who were aged 35 years or older and had biopsy-proven anal HSIL. Participants were randomly assigned in a 1:1 ratio to receive either HSIL treatment or active monitoring without treatment. Nine cases were diagnosed in the treatment group (173 per 100,000 person-years; 95% CI, 90.0–332.0), and 21 cases were diagnosed in the active-monitoring group (402 per 100,000 person-years; 95% CI, 262.0–616.0) after a median follow-up of 25.8 months. The rate of progression to anal cancer was 57% lower in the treatment group than it was in the active-monitoring group (95% CI, 6.0–80.0; P = .03 by log-rank test).

In a recent cohort study of 28,175 individuals being treated for HIV (59.7%, men who have sex with men [MSM]), 227 primary anal cancer cases were diagnosed.[6] Despite the increasing average age of the cohort, crude incidence rates of anal cancer in MSM declined slowly over time from 107.0 per 100,000 person-years (95% CI, 75.7–147.0) in 1996 to 2005 to 93.7 per 100,000 person-years (95% CI, 75.3–115.0) in 2013 to 2020 (P = .49). Crude incidence rates in men who do not have sex with men (non-MSM) and women were generally lower than those in MSM. However, crude incidence rates increased slightly over time from 51.08 per 100,000 person-years (95% CI, 20.54–105.25) to 67.82 per 100,000 person-years (95% CI, 40.83–105.91; P = .52) in non-MSM and from 8.09 per 100,000 person-years (95% CI, 0.20–45.06) to 24.95 per 100,000 person-years (95% CI, 10.03–51.40; P = .29) in women. In addition, the authors compared a subcohort of 3,866 MSM who received high-resolution anoscopy (HRA) screening at least once and treatment for HSIL. Furthermore, if screened individuals had low-grade squamous intraepithelial lesions (LSIL), they continued HRA screening once yearly, and those who had HSIL treatment received HRA screening every 6 months. TNM tumor staging was more favorable (Cochrane-Armitage test for trend, P = .033) in individuals diagnosed with anal cancer during screening. Crude anal cancer–associated 5-year mortality in people living with HIV decreased from 30.4% (1996–2005) to 18.3% (2013–2020; odds ratio, 0.48; P = .070). Anal cancer–related mortality was 3.7% (95% CI, 0.5–23.5) in all men who had been screened and 24.0% (95% CI, 18.1–31.3) in men who had not been screened (P = .023). In men, screening participation (hazard ratio [HR], 0.31; P = .051) and cumulative exposure to CD4 counts of less than 200 cells per µL (HR, 1.11 per year; P = .0022) were independently associated with anal cancer–related mortality.

Even though people living with HIV represent a high-risk population, anal cancer is still rare, and there were few anal cancers in this cohort, rendering conclusions difficult. In particular, there were only 37 anal cancers in non-MSM and only 10 among women. As a result, CIs were wide, and conclusions were suggestive at best. Of note, there are no known randomized controlled trials that provide evidence to support the conclusion of this study.

Data do not support the conclusion that men had improved survival when they were diagnosed with anal cancer after screening or that it is important to screen those who are at high risk of developing anal cancer. The study purported to show reduced mortality after an anal cancer diagnosis among screened men, but the curves in the study's results did not make adjustments for lead-time bias, selection bias, nor the possibility of overdiagnosis bias. The study also suggested that there was a larger proportion of early-stage cases among screened individuals, but the proportional stage shift caused by anal cancer screening is known to be influenced by lead-time and overdiagnosis biases. There was no mention of adjustment for these biases in the study's results. In addition, there was a high proportion of unknown stages, further suggesting that the conclusions in this study were not supported by the data. This is an additional rationale for why the data did not support the conclusion of the study.

### References

Giuliano AR, Palefsky JM, Goldstone S, et al.: Efficacy of quadrivalent HPV vaccine against HPV Infection and disease in males. N Engl J Med 364 (5): 401-11, 2011.21288094
Palefsky JM, Lensing SY, Belzer M, et al.: High Prevalence of Anal High-Grade Squamous Intraepithelial Lesions, and Prevention Through Human Papillomavirus Vaccination, in Young Men Who Have Sex With Men Living With Human Immunodeficiency Virus. Clin Infect Dis 73 (8): 1388-1396, 2021.33991185
Palefsky JM, Giuliano AR, Goldstone S, et al.: HPV vaccine against anal HPV infection and anal intraepithelial neoplasia. N Engl J Med 365 (17): 1576-85, 2011.22029979
Kreimer AR, González P, Katki HA, et al.: Efficacy of a bivalent HPV 16/18 vaccine against anal HPV 16/18 infection among young women: a nested analysis within the Costa Rica Vaccine Trial. Lancet Oncol 12 (9): 862-70, 2011.21865087
Palefsky JM, Lee JY, Jay N, et al.: Treatment of Anal High-Grade Squamous Intraepithelial Lesions to Prevent Anal Cancer. N Engl J Med 386 (24): 2273-2282, 2022.35704479
van der Zee RP, Wit FWNM, Richel O, et al.: Effect of the introduction of screening for cancer precursor lesions on anal cancer incidence over time in people living with HIV: a nationwide cohort study. Lancet HIV 10 (2): e97-e106, 2023.36640800

## Interventions With Inadequate Evidence as to Whether They Reduce the Risk of Anal Cancer

### Condom Use

Because human papillomavirus (HPV) can be transmitted through microabrasions, as well as through more pronounced exposures such as exchange of certain bodily fluids,[1] restriction of condom use to penetrative activity will not protect against transmission that occurs as part of other sexual contact. Nevertheless, condom use would be expected to reduce some risk of transmission and thus anal cancer risk. Few data that explore these hypotheses exist, and those that do suggest a very modest effect, if any. Of note, the ability of condom use to reduce cervical cancer risk is still uncertain and the subject of debate.[2]

In an Italian cohort of 258 HIV-negative men who have sex with men (MSM), the odds ratio (OR) for infection with high-risk HPV strains was 1.7 (95% confidence interval [CI], 0.52–6.3) for inconsistent or no use of condoms in receptive anal sex, compared with consistent condom use.[3] In a Brazilian cohort that included 176 MSM, the OR for oncogenic HPV infection was 1.8 (95% CI, 0.77–4.35) for men who sometimes used condoms for anal sex and 1.8 (95% CI, 0.58–5.68) for men who never used condoms, compared with men who always used condoms.[4]

### References

IARC Working Group on the Evaluation of Carcinogenic Risks to Humans: Human papillomaviruses. IARC Monogr Eval Carcinog Risks Hum 90: 1-636, 2007.18354839
Chelimo C, Wouldes TA, Cameron LD, et al.: Risk factors for and prevention of human papillomaviruses (HPV), genital warts and cervical cancer. J Infect 66 (3): 207-17, 2013.23103285
Donà MG, Palamara G, Di Carlo A, et al.: Prevalence, genotype diversity and determinants of anal HPV infection in HIV-uninfected men having sex with men. J Clin Virol 54 (2): 185-9, 2012.22418456
Nyitray AG, Carvalho da Silva RJ, Baggio ML, et al.: Age-specific prevalence of and risk factors for anal human papillomavirus (HPV) among men who have sex with women and men who have sex with men: the HPV in men (HIM) study. J Infect Dis 203 (1): 49-57, 2011.21148496

## Latest Updates to This Summary (04/08/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Incidence, Mortality, and Survival

Updated statistics with estimated new cases and deaths for 2025 (cited American Cancer Society as reference 2).

This summary is written and maintained by the PDQ Screening and Prevention Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/screening-prevention), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about anal cancer prevention. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Screening and Prevention Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/screening-prevention), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Screening and Prevention Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Screening and Prevention Editorial Board. PDQ Anal Cancer Prevention. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/anal/hp/anal-prevention-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389511]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).